# Depression (PDQ®)

Patient Version

This PDQ cancer information summary has current information about cancer-related depression and suicide risk in both the adult and the pediatric population. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## General information about depression

Key Points for This Section
- Depression is different from normal sadness.
- Depression can be treated.
- Some people with cancer may have a higher risk of depression.
- There are many medical conditions that can cause depression.
- Family members of people with cancer are also at risk of depression.

### Depression is different from normal sadness.

Depression is more than feeling down or sad from time to time. It is a medical problem marked by ongoing feelings of sadness, despair, loss of energy, and difficulty dealing with daily life. If you have these feelings most of the day for longer than 2 weeks, it may be a sign of major depression.

Other symptoms of major depression include

- loss of pleasure and interest in activities you used to enjoy
- changes in eating and sleeping habits
- slow physical and mental responses
- feeling restless or jittery
- unexplained tiredness
- feeling worthless, hopeless, or helpless
- feeling a lot of guilt for no reason
- not being able to pay attention
- thinking the same thoughts over and over
- frequent thoughts of death or suicide

People diagnosed with cancer may also have other symptoms of depression, such as

- feelings of disbelief or denial
- anxiety or worry about the future
- grief

Symptoms of depression are not the same for every person.

Cancer-related risk factors such as cancer type, stage, and treatment may contribute to depression, but having a personal history of mental health issues or a lack of social support are more important factors. Cancer-related fatigue, pain, and weaker physical condition can also increase depression risk.

### Depression can be treated.

It's important to know that help is available for people with depression. Tell your health care team how you are feeling and discuss your treatment options with them. Getting the help you need is important for your life and your health.

If you have thoughts of suicide, dial 911 in an emergency or call, text, or chat 988 to reach the 988 Suicide and Crisis Lifeline. Counselors are available 24 hours a day, 7 days a week, including for people who are deaf or hard of hearing.

### Some people with cancer may have a higher risk of depression.

A person diagnosed with cancer faces many stressful issues, which may increase the risk of depression. These may include

- being confronted with our mortality
- changes in life plans
- changes in body image and self-esteem
- changes in day-to-day living
- worry about money and legal issues

About 2 out of every 10 people diagnosed with cancer become depressed. The number of men and women affected are about the same.

Certain risk factors may increase your chance of developing depression after a cancer diagnosis. Risk factors related to cancer that may cause depression include

- learning you have cancer when you are already depressed
- having cancer pain that is not well controlled
- being physically weakened by the cancer
- having pancreatic cancer or head and neck cancer
- having advanced cancer or a poor prognosis
- taking certain drugs, such as corticosteroids, procarbazine (https://www.cancer.gov/about-cancer/treatment/drugs/procarbazinehydrochloride), L-asparaginase (https://www.cancer.gov/about-cancer/treatment/drugs/asparaginase-erwinia-chrysanthemi), interferon alfa (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-interferon-alfa-2b), interleukin-2 (https://www.cancer.gov/about-cancer/treatment/drugs/aldesleukin), amphotericin B

Risk factors not related to cancer that may cause depression include

- a personal history of depression, suicide attempts, or other mental health problems
- a family history of depression or suicide
- a personal history of alcoholism or drug abuse
- lacking support from family or friends
- stress caused by life events other than cancer
- having other health problems, such as stroke or heart attack that may also cause depression

Not everyone who is diagnosed with cancer reacts in the same way. Some people with cancer may not have depression or anxiety, while others may have major depression or an anxiety disorder. For more information on anxiety disorders, see Adjustment to Cancer: Anxiety and Distress.

### There are many medical conditions that can cause depression.

Medical conditions that may cause depression in people with cancer include

- pain that doesn't go away with treatment
- abnormal levels of calcium, sodium, or potassium in the blood
- not enough vitamin B12 or folate in your diet
- anemia
- fever
- too much or too little thyroid hormone
- too little adrenal hormone
- side effects caused by certain drugs
- cancer in the central nervous system
- poor sleep

### Family members of people with cancer are also at risk of depression.

Anxiety and depression may occur in family members who are caring for loved ones with cancer. Family members who talk about their feelings and solve problems together are less likely to have high levels of depression and anxiety.

If you are a caregiver, watch for signs of depression or anxiety in yourself and talk with your doctor even if you think what you are feeling is normal. It's important that you take care of your own health and seek help when you need it. For more information, see Support for Caregivers of Cancer Patients (https://www.cancer.gov/about-cancer/coping/caregiver-support).

## Diagnosis of depression

Key Points for This Section
- Your health care provider will talk with you to find out if you have symptoms of depression.
- Physical exams and lab tests are also used to diagnose depression.

### Your health care provider will talk with you to find out if you have symptoms of depression.

Your health care provider may want to discuss the following:

- Your feelings about having cancer. Talk with your doctor to see if your feelings are normal sadness or more serious.
- Your moods. You may be asked to rate your mood on a scale.
- Any symptoms of depression you may have and how long they have lasted.
- How the symptoms of depression affect your daily life, such as your relationships, your work, and your ability to enjoy your usual activities.
- Other parts of your life that are causing stress.
- How strong your social support system is.
- A list of the drugs and supplements you are taking and other treatments you are receiving. Sometimes, side effects of drugs or the cancer seem like symptoms of depression. This is more likely during active cancer treatment or if you have advanced cancer.

Your health care team will continue to monitor your symptoms to keep your depression from getting worse.

### Physical exams and lab tests are also used to diagnose depression.

In addition to talking with you, your doctor may

- ask about your personal and family medical history to learn more about your possible risk factors for depression
- do a physical exam to check general signs of health, which can help rule out other causes of your symptoms
- run laboratory tests to rule out a medical condition that may be causing symptoms of depression

## Treatment of depression

Key Points for This Section
- The decision to treat depression depends on how long it has lasted and how much it affects your life.
- Counseling or talk therapy helps some people with depression.
- Physical activity may help relieve depression symptoms.
- Antidepressants help some people with depression.
- There are different types of antidepressants.
- The antidepressant that is best for you depends on several factors.
- Your doctor will watch you closely if you need to change your antidepressant.

### The decision to treat depression depends on how long it has lasted and how much it affects your life.

You may have depression that needs to be treated if you are not able to perform your usual activities, have severe symptoms, or the symptoms do not go away. Treatment of depression may include talk therapy, medicines, or both.

### Counseling or talk therapy helps some people with depression.

Your doctor may suggest you see a psychologist or psychiatrist because

- your symptoms have been treated with medicine for 2 to 4 weeks and are not getting better
- your depression is getting worse
- you are experiencing unwanted side effects from antidepressants
- depression keeps you from continuing with your cancer treatment

Most counseling or talk therapy programs for depression are offered in both individual and small-group settings. These programs include crisis intervention, psychotherapy, and cognitive-behavior therapy.

More than one type of therapy program may be right for you. A therapy program can help you learn about

- coping and problem-solving skills
- relaxation skills and ways to lower stress
- ways to get rid of or change negative thoughts
- cancer and its treatment

Talking with a clergy member may also be helpful for some people.

### Physical activity may help relieve depression symptoms.

Being physically active may help relieve depression and its symptoms. At least 150 minutes of moderate-to-vigorous exercise per week has been shown to reduce depression in breast cancer survivors.

### Antidepressants help some people with depression.

Antidepressants may help relieve depression and its symptoms. When you are taking antidepressants, it's important that you use them under the care of a doctor. Some antidepressants take 3 to 6 weeks to work. To avoid side effects, you usually begin at a low dose that is slowly increased to find the right dose for you.

You may be treated with a number of drugs during your cancer care. Some anticancer drugs may not mix safely with certain antidepressants or with certain foods, herbals, or nutritional supplements. It's important to tell your health care providers about all the drugs, herbals, and nutritional supplements you are taking, including drugs used as patches on the skin, and any other diseases, conditions, or symptoms you have. This can help prevent unwanted reactions with your antidepressant.

### There are different types of antidepressants.

Most antidepressants help treat depression by changing the levels of chemicals called neurotransmitters in the brain, while some affect cell receptors. Nerves use these chemicals to send messages to one another. Increasing the amount of these chemicals helps to improve mood. The different types of antidepressants act on these chemicals in different ways and have different side effects.

Several types of antidepressants are used to treat depression:

- SSRIs (selective serotonin reuptake inhibitors) are drugs that stop serotonin (a substance that nerves use to send messages to one another) from being reabsorbed by the nerve cells that make it. This means there is more serotonin for other nerve cells to use. SSRIs include citalopram, escitalopram, and fluoxetine. SSRIs are commonly used antidepressants in people with cancer and work well to treat depression.
- SNRIs (serotonin-norepinephrine reuptake inhibitors) are drugs that stop the brain chemicals serotonin and norepinephrine from being reabsorbed by the nerve cells that make it. This means there is more serotonin and norepinephrine for other nerve cells to use. Some SNRIs may also help relieve neuropathy caused by chemotherapy or hot flashes caused by menopause. SNRIs include venlafaxine, duloxetine, and levomilnacipran.
- Tricyclic antidepressants work the same way SNRIs do. Tricyclic antidepressants may be used for depression that does not respond to other types of antidepressants. They can also help relieve headaches, neuropathy caused by chemotherapy, and problems falling or staying asleep. Tricyclic antidepressants include amitriptyline, doxepin, and imipramine.
- NDRIs (norepinephrine-dopamine reuptake inhibitors) are drugs that stop the brain chemicals norepinephrine and dopamine from being reabsorbed. This means there is more norepinephrine and dopamine for other nerve cells to use. The only NDRI currently approved to treat depression is bupropion.

Other antidepressants include mirtazapine, trazodone, and monoamine oxidase inhibitors.

Sometimes, other drugs, such as benzodiazepines or psychostimulants, are given along with antidepressants to decrease anxiety or improve energy and concentration.

### The antidepressant that is best for you depends on several factors.

Choosing the best antidepressant for you depends on

- your symptoms
- side effects of the antidepressant
- your medical history
- other medicines you are taking
- how you or your family members responded to antidepressants in the past
- the form of medicine you are able to take (such as a pill or a liquid)

You may have to try different treatments to find the one that is right for you.

### Your doctor will watch you closely if you need to change your antidepressant.

You may need to change your antidepressant if severe adverse effects occur or your symptoms are not getting better. Check with your doctor before you stop taking an antidepressant. Your doctor will reduce the dose slowly before starting another antidepressant. This is to prevent side effects that can occur if you suddenly stop taking your antidepressant.

## Suicide risk in people with cancer

Key Points for This Section
- People with cancer may feel hopeless at times and think about suicide.
- Certain factors may increase the risk of suicidal thoughts in people with cancer.
- The health care team will ask if you have thoughts of suicide and help manage the cause of the thoughts.

### People with cancer may feel hopeless at times and think about suicide.

Some people with cancer feel hopeless. Talk with your doctor if you feel hopeless. There are ways your doctor can help you.

Feelings of hopelessness may lead to thinking about suicide. If you or someone you know is thinking about suicide, get help as soon as possible. You can get help from the National Suicide Prevention Lifeline (https://suicidepreventionlifeline.org/), 1-800-273-TALK (8255). The Lifeline is available 24 hours a day, 7 days a week. The deaf and hard of hearing can contact the TTY Lifeline at 1-800-799-4889. All calls are confidential. More information about depression (https://www.nimh.nih.gov/health/topics/depression/index.shtml) and suicide prevention (https://www.nimh.nih.gov/health/topics/suicide-prevention/index.shtml) is available from the National Institute of Mental Health.

### Certain factors may increase the risk of suicidal thoughts in people with cancer.

Higher rates of suicidal thoughts, suicidal behaviors, and suicide attempts have been noted in patients with cancer.

Some factors that may increase the risk of suicide include older age, being male, and

- being single, divorced, or widowed
- having a personal history of depression, anxiety, or other mental health problem, or suicide attempts
- having a family member who has attempted suicide
- having a personal history of drug or alcohol abuse
- feeling hopeless or that you are a burden to others
- lacking support from family and friends
- being unable to live a normal, independent life because of problems with day-to-day activities, pain, or other symptoms
- being within the first 6 months of your cancer diagnosis
- having advanced cancer or a poor prognosis
- having cancer of the prostate, lung, head and neck, or pancreas
- having uncontrolled symptoms or side effects of cancer and/or cancer treatment, such as pain
- not getting along well with the treatment team

### The health care team will ask if you have thoughts of suicide and help manage the cause of the thoughts.

Talk to your doctor if you have thoughts of hopelessness and are thinking of suicide. You may feel more in control of your emotions once you describe your feelings and fears.

People with cancer may feel desperate to stop any discomfort or pain they have. Keeping pain and other symptoms under control will help to

- relieve distress
- make you feel more comfortable
- prevent thoughts of suicide

Ask your doctor what may be done to help relieve your emotional and physical pain. Treatment may include antidepressants. Some antidepressants take a few weeks to work. The doctor may prescribe other drugs that work quickly to relieve distress until the antidepressant begins to work. For your safety, it's important to have frequent contact with a health care professional and avoid being alone until your symptoms are controlled. Your health care team can help you find social support.

## Depression in children

Key Points for This Section
- Your child will be examined for signs of depression.
- The symptoms of depression are not the same in every child.
- Treatment may be talk therapy or antidepressants.

Some children have depression or other problems related to cancer.

Most children cope well with cancer. However, a small number of children may have

- depression
- anxiety
- trouble sleeping
- problems getting along with family or friends
- problems following the treatment plan

These problems can affect the child's cancer treatment and enjoyment of life. They can occur at any time from diagnosis to well after treatment ends. Survivors of childhood cancer who have severe late effects from cancer treatment may be more likely to have symptoms of depression.

A psychologist or psychiatrist can help children with depression.

### Your child will be examined for signs of depression.

Your health care team may ask the following questions:

- How is your child eating and sleeping?
- Is your child more tired than usual?
- How has your child coped with past illnesses?
- How is your child's behavior at home and at school? Have they had trouble getting along with others or learning?
- Does your child have more anger, outbursts, or crying than usual?
- Has your child withdrawn from activities they used to enjoy?

### The symptoms of depression are not the same in every child.

A diagnosis of depression depends on the symptoms and how long they have lasted. Symptoms of depression in children may include

- appetite changes
- not sleeping or sleeping too much
- feeling very tired or having little energy
- being unable to relax and be still (such as pacing, fidgeting, and pulling at clothing)
- frequent crying
- loss of interest in usual activities
- lack of emotion in children younger than 6 years
- feelings of worthlessness, blame, or guilt
- unable to think or pay attention and frequent daydreaming
- trouble learning in school, not getting along with others, and refusing to go to school
- frequent thoughts of death or suicide

### Treatment may be talk therapy or antidepressants.

Talk therapy is the main treatment for depression in children. The child may talk to the counselor alone or with a small group of other children. Talk therapy may include play therapy for younger children. Therapy will help the child cope with feelings of depression and understand their cancer and treatment.

Antidepressants may be given to children with major depression or anxiety. In some children, teenagers, and young adults, antidepressants may make depression worse or cause thoughts of suicide. The Food and Drug Administration has warned that people younger than age 25 who are taking antidepressants should be watched closely for signs that the depression is getting worse and for suicidal thinking or behavior.

## To learn more about depression

For more information from the National Cancer Institute about depression, see

- Adjustment to Cancer: Anxiety and Distress
- Coping with Advanced Cancer (https://www.cancer.gov/publications/patient-education/advanced-cancer)
- Emotions and Cancer (https://www.cancer.gov/about-cancer/coping/feelings)

For general information about depression and suicide prevention from the National Institute of Mental Health, see

- Depression (https://www.nimh.nih.gov/health/topics/depression/index.shtml)
- Suicide Prevention (https://www.nimh.nih.gov/health/topics/suicide-prevention/index.shtml)
- Psychotherapies (Talk Therapy) (https://www.nimh.nih.gov/health/topics/psychotherapies/index.shtml)
- Mental Health Medications (https://www.nimh.nih.gov/health/topics/mental-health-medications/index.shtml)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about cancer-related depression and suicide risk in both the adult and the pediatric population. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Depression. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/feelings/depression-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389474]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).